# Informal Caregivers in Cancer (PDQ®)

Patient Version

This PDQ cancer information summary has current information about challenges and helpful interventions for caregivers of cancer patients. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Roles of Informal Caregivers

Key Points for This Section
- Caregivers help people with cancer during and after treatment.

### Caregivers help people with cancer during and after treatment.

An informal caregiver, often a family member or friend, gives care to someone they have a personal relationship with, usually without payment. They may or may not live in the same home or geographic area as the person they are caring for.

Caregivers help with the daily needs of another person by:

- helping with personal needs, such as bathing, dressing, and mobility
- doing or arranging housework, such as cleaning, shopping, and cooking
- managing finances
- planning for care and services such as making appointments, providing transportation, and reporting problems
- visiting often
- providing emotional support

Formal caregivers are trained professionals who are paid to provide care for a patient and are not the focus of this page.

## Needs of Informal Caregivers

Key Points for This Section
- Caregivers may have questions about treatment and side effects, how to find helpful resources, and ways to practice self-care.
- Caregivers also have emotional, social, and financial needs.
- Caregivers may have different needs after their loved one completes treatment.
- Caregiver distress increases when the person with cancer is at the end of life.

### Caregivers may have questions about treatment and side effects, how to find helpful resources, and ways to practice self-care.

If you are a caregiver, your information needs will change as the person with cancer's needs change during and after treatment. As a member of the care team, you may play an important role in coordinating your loved one's care, giving drugs and managing side effects, and keeping family members informed.

You may have questions for the health care provider about:

- The cancer: What can you tell me about the type of cancer my family member or friend has?
- Risks and benefits: What are the risks and benefits of treatment?
- Side effects: How do I care for my family member or friend when they are having side effects from treatment while at home?
- Medical and nursing tasks: How do I give an injection? How do I set up the tube feedings?
- Recovery: How long will it take my family member or friend to recover?
- Complementary and alternative therapies: Do I need to check with you before my family member or friend uses a complementary and alternative (CAM) therapy? What CAM therapies are useful?
- Care for yourself: What are the best ways I can maintain my health and well-being while caregiving?
- Emotions felt by patients and caregivers: What are some ways we can deal with what we are feeling?
- Local, community-based resources: What are some local resources I can turn to?

### Caregivers also have emotional, social, and financial needs.

It is easy to become overwhelmed as a caregiver. And it is normal to worry about what the future holds for your loved one. You may need support for yourself to:

- manage fears about your loved one's condition and future
- balance the time needed for your job and the time needed for caregiving
- find time for your friends
- pay your bills

People with cancer also worry about these things, but their top concern and the top concern of caregivers may not be the same, which may cause added stress.

### Caregivers may have different needs after their loved one completes treatment.

When people with cancer complete treatment, the needs of caregivers decrease, but some caregivers may continue to worry about:

- the cancer coming back
- how to reduce stress in the survivor's life
- how to understand the survivor's experience

### Caregiver distress increases when the person with cancer is at the end of life.

Caregivers of people who are nearing the end of life often have a low mental and physical quality of life. Caregiver distress and the need for additional support increase as the person with cancer nears the end of life.

Hospice care can provide much needed support to people with cancer and their caregivers. Caregivers are often relieved by the hospice care team's ability to honor their loved one's care goals and provide high-quality end-of-life care. Learn more about hospice care at Hospice.

## Benefits of Being an Informal Caregiver

Some caregivers report positive experiences from caregiving that often lead to personal growth in the following areas:

- Acceptance. Adjusting to things that cannot change.
- Family. Feeling a closer bond with family.
- Appreciation. Being aware of love and support and having a greater joy of life.
- Reprioritization. Arranging life priorities in a new order of importance.
- Increased faith. Having a greater sense of closeness to God and renewed spiritual practices.
- Empathy. Understanding and feeling what others feel.
- Positive self-view. Feeling good about oneself.
- Better health habits. Eating a healthy diet, getting more exercise, and keeping up with medical checkups.

## Burdens of Being an Informal Caregiver

Key Points for This Section
- Caregivers may feel burdened when caring for people with cancer.
- Caregiver burden may be increased by certain factors, such as sex and age.

### Caregivers may feel burdened when caring for people with cancer.

You may find it hard to cope with the emotional and physical aspects of caring for someone with cancer. This may lead to caregiver burden.

Caregiver burden is the stress or strain felt by the person who cares for the family member or friend who needs help during a treatment or an illness. A burden is felt when the demands of caregiving are greater than the resources available to them. These demands can lead to negative effects of caregiving such as:

- anxiety
- depression
- post-traumatic stress disorder
- decline in quality of life

### Caregiver burden may be increased by certain factors, such as sex and age.

The following factors may increase caregiver burden:

- Female sex. Women, especially those who work, are more likely to have caregiver burden.
- Age. Caregiver burden can occur at any age.
  - Older caregivers. Older caregivers are at risk of caregiver burden because their health, social, or financial situations may make it hard for them to care for others. As a result, they are more likely to have depression, poor health, and a higher risk of death than noncaregivers in the same age group. Older caregivers are at risk of caregiver burden when they have the following conditions:
    - health problems of their own that they neglect
    - fixed incomes
    - small social support networks
    - less time to exercise
    - trouble remembering to take their own medicines
    - fatigue from lack of sleep
  - Middle-aged caregivers. Middle-aged caregivers may worry about being able to balance their caregiving and work responsibilities. They may worry about missing workdays, being less productive at work, and needing to take a leave of absence.
  - Younger caregivers. Younger caregivers often juggle work and their own family duties. They may also have to give up part of their social lives to be a caregiver.
- Culture. There are cultural perspectives to caregiving that may increase the risk of caregiver burden. For example, some cultures have strong family ties, leading caregivers to use fewer support services, including counseling and support groups, home care, long-term care, and hospice services. Additionally, different cultures may have beliefs about death and dying that make discussions with the health care team about prognosis and care difficult. Being unable to have these discussions can add to a caregiver's sense of burden and duty.
- Socioeconomic status. Socioeconomic status is the social standing of someone that is measured by a person's education, income, and job. People with a lower socioeconomic status may have less access to resources and financial help. Lower incomes and limited financial options may cause patients and their families to make treatment-related choices that are not the same as their doctor prescribed.
- Employment. Caregivers may need to take time off from their job or make changes in the hours they work or the duties they perform. Work progress may suffer when a caregiver is not focused and can lead to anxiety and depression.
- Role strain. A caregiver may have many roles. They may also be a spouse, parent, child, friend, employee, or student. Role strain happens when the rights, duties, and behaviors of one role conflict with a different role. Sometimes having more than one role can increase stress for a caregiver, but sometimes it reduces stress by allowing them to step away from the caregiver role for a while. For example, when a caregiver goes to work, they may benefit from the support of their employer and coworkers, and from the time away from caregiving.
- Site of care. Caregivers have more burden when the person with cancer leaves the hospital and comes home. The caregiver now must help manage the person's symptoms and may be unsure about the prognosis or if the cancer can spread. Visits by home health nurses can help reduce this burden. Sudden changes in site of care, such as going back to the hospital, also increase caregiver burden.
- Patient characteristics. Caregivers may have more burden when the person with cancer has poor physical and mental health, such as anxiety and depression. If the person has a poor quality of life, this may also increase caregiver burden.

## Parents as Caregivers

Key Points for This Section
- Caring for a child with cancer is a stressful time for parents.
- Stress levels of parents may be affected by several factors.

### Caring for a child with cancer is a stressful time for parents.

Being told that your child has cancer is extremely distressing. Many parents say they feel shocked, overwhelmed, and confused. Parents must manage the same needs and burdens as other caregivers, while remaining strong for their sick child and their other children.

Parents caring for children with cancer may report symptoms of traumatic stress during and after their child's diagnosis. Symptoms include:

- repeated, unwanted thoughts
- avoiding difficult thoughts, feelings, and situations
- increased heart rate and blood pressure

Although stress levels decrease for most parents after their child finishes treatment, some parents report long-term traumatic stress symptoms after treatment ends.

### Stress levels of parents may be affected by several factors.

The following factors may reduce stress in parents caring for children with cancer:

- social support from family and friends
- support from health care team members
- maintaining a positive view of the child's quality of life
- believing that treatments will have a positive outcome
- being employed

For information and advice for parents who have a child with cancer, see Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Ways to Reduce Caregiver Burden

Key Points for This Section
- There are many ways to help you decrease caregiver burden.

### There are many ways to help you decrease caregiver burden.

The following therapies or skills may prevent or reduce caregiver burden:

- Cognitive behavioral therapy. A type of therapy that helps change the way a caregiver thinks and feels about certain things.
- Complementary and/or alternative therapies. Many options, such as guided imagery, massage therapy, or healing touch, help caregivers manage stress and anxiety.
- Family/couples therapy. Counseling that helps families work through problems in a way that makes the family stronger.
- Interpersonal therapy. One-on-one counseling that focuses on your relationships with other people to reduce caregiver burden.
- Problem solving/skill building. Helping the caregiver develop the following skills:
  - ability to assess and manage the patient's symptoms
  - identify solutions to caregiving problems
  - enhance the caregiver's ability to cope with cancer caregiving roles and duties
- Psychoeducation. Helping caregivers cope by providing them with information about:
  - diagnosis
  - prognosis
  - self-care/home care
  - impact on partners and family
  - hospital care
  - follow-up and recovery
- Palliative care. Using palliative care to improve the loved one's quality of life. When their quality of life is improved, the caregiver often feels less burdened.
- Supportive therapy. A type of therapy that addresses the emotional needs of caregivers.

## To Learn More About Caregiving

For more information from the National Cancer Institute about caregiving, see the following:

- Support for Caregivers of Cancer Patients (https://www.cancer.gov/about-cancer/coping/caregiver-support)
- Caregiver Health (https://medlineplus.gov/caregiverhealth.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about challenges and helpful interventions for caregivers of cancer patients. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Informal Caregivers in Cancer. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/family-friends/family-caregivers-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389372]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).